# Cognitive Impairment in Adults with Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about cognitive impairment in adults. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Cognitive Problems in Cancer Survivors

Key Points for This Section
- Cognition problems can change the way you think and learn.
- Memory loss and thinking problems are common in people with cancer and cancer survivors.

### Cognition problems can change the way you think and learn.

Cognition is the process of how you learn, remember, and become aware of what is around you.

This process includes being able to do the following:

- Focus on important information, thoughts, and actions.
- Pay attention to a task or activity for a long period of time.
- Predict what may happen, plan, and solve problems.
- Learn quickly.
- Have a sense of where objects are around you.
- Understand and communicate by speaking and writing.
- Learn and remember new information.

When your cognition changes, you may have problems with daily tasks.

This summary is about cognitive changes that occur in people with cancer and cancer survivors.

### Memory loss and thinking problems are common in people with cancer and cancer survivors.

Your thought process may change, and it may be hard for you to focus and remember things the same way as you did before your cancer treatment.

Talk to your doctor about memory loss and thinking problems you have during or after treatment.

## Signs of Cognitive Problems

Key Points for This Section
- Signs of cognitive problems include trouble learning or remembering.
- Cancer treatments or other diseases may cause cognitive problems.
- Your doctor will examine you to better understand your cognitive problems.

### Signs of cognitive problems include trouble learning or remembering.

Other conditions may also cause cognitive problems. Talk to your doctor if you have memory loss or are unable to do the following:

- Focus on what you are doing.
- Complete tasks.
- Understand what people are saying.
- Remember names and common words.
- Recognize familiar objects.
- Follow instructions.
- Manage your money well. For example, you may have trouble paying bills or balancing your checkbook.

You may also notice the following changes:

- Disorganized behavior or thinking.
- Loss of interest.
- Problems making sense of the world around you.

### Cancer treatments or other diseases may cause cognitive problems.

Factors that cause cognitive problems in people with cancer and cancer survivors include the following:

- Older age.
- Being weak or frail.
- Cancer treatments, such as chemotherapy or radiation therapy, or other medications, and their side effects.
- Being postmenopausal.
- Distress, such as anxiety or depression.
- Symptoms, such as pain, fatigue, or trouble sleeping.
- Other diseases or conditions.
- Using alcohol or other substances that change your mental state.
- The stage of the cancer (the size of the tumor, and whether it has spread to the lymph nodes or other parts of the body).
- Higher levels of certain proteins in the blood.

The cognitive effects of endocrine therapy were studied in breast cancer survivors. Patients who received 5 years of treatment with exemestane were compared with those who received 2.5 years of tamoxifen followed by 2.5 years of exemestane, and with healthy participants. Findings suggested that tamoxifen may have more adverse cognitive effects than exemestane. More studies are needed to confirm these results.

### Your doctor will examine you to better understand your cognitive problems.

Your doctor will ask about your health history and usual daily activities to find out a cause of your cognitive problems. Your doctor will also do an exam to check for signs of disease.

## Treatment of Cognitive Problems

Key Points for This Section
- Treatment of cognitive problems may include activities that help your attention, memory, and thinking.
  - Cognitive rehabilitation
  - Exercise and physical activity
  - Attention restoration
  - Meditation
- Certain drugs are being studied to treat cognitive problems.

### Treatment of cognitive problems may include activities that help your attention, memory, and thinking.

#### Cognitive rehabilitation

The goal of cognitive rehabilitation is to improve your memory and the way you think, organize, and make decisions. Cognitive rehabilitation involves the following:

- Learning ways to take in new information and perform new tasks or behaviors.
- Staying organized by using tools, such as calendars or electronic diaries.
- Doing activities over and over, usually on a computer, that become more challenging over time.

#### Exercise and physical activity

Exercise, physical activity, and mind-body practices, such as tai chi, qigong, or yoga, may improve the way you think and focus.

#### Attention restoration

Activities that restore attention may help you stay focused on what is around you. These activities may include walking, gardening, bird-watching, and caring for pets.

#### Meditation

Meditation may help improve cognitive function. Meditation is a mind-body practice in which a person focuses his or her attention on something, such as an object, word, phrase, or breathing. This will help keep you from being distracted or having stressful thoughts or feelings. Mindfulness-based stress reduction is a type of meditation that focuses on bringing attention and awareness to each moment.

### Certain drugs are being studied to treat cognitive problems.

Several drugs have been studied to treat cognitive problems in people who have or who have had cancer, such as psychostimulants and erythropoietin-stimulating agents, but results are mixed. More research is needed.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about expert-reviewed information summary about causes and management of cognitive impairment in people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cognitive Impairment in Adults with Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/memory/cognitive-impairment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).